# Last Days of Life (PDQ®)

Patient Version

This PDQ cancer information summary has current information about patient care during the last days to last hours of life. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

The end of life may be months, weeks, days, or hours. It is a time when many decisions about treatment and care are made for people with cancer. It is important for families and health care providers to talk openly with the person about their end-of-life plans and know their wishes ahead of time. This will make it easier for family members to make major decisions for the person at the end of life.

When treatment choices and plans are discussed before the end of life, it can lower the stress on both the patient and the family. It is most helpful if end-of life planning and decision-making begin soon after the cancer is diagnosed and continue during the course of the disease. Having these decisions in writing can make the person's wishes clear to both the family and the health care team.

When a child is terminally ill, end-of-life discussions with the child's doctor may reduce the time the child spends in the hospital and help the parents feel more prepared.

This summary is about end of life in adults with cancer and, where noted, children with cancer. It discusses care during the last days and last hours of life, including treatment of common symptoms and ethical questions that may come up. It may help patients and their families prepare for decisions they must make during this time.

For more information on end-of-life planning, including palliative and hospice care, see Hospice.

## Care in the Final Hours

Key Points for This Section
- Knowing what to expect in the final days or hours helps comfort the family.
- People may not want to eat or drink in the final days or hours.
- People near death may not respond to others.
- A number of physical changes are common when a person is near death.
- Cultural or religious beliefs and customs may be important at the time of death.

### Knowing what to expect in the final days or hours helps comfort the family.

Most people don't know the signs that show death is near. Knowing what to expect can help them get ready for the death of their loved one and make this time less stressful and confusing. Health care providers can give family members information about the changes they may see in their loved one in the final hours and how they may help their loved one through this.

### People may not want to eat or drink in the final days or hours.

In the final days to hours of life, people often lose the desire to eat or drink, and may not want food and fluids that are offered to them. The family may give ice chips or swab the mouth and lips to keep them moist. Food and fluids should not be forced on the person because it can cause discomfort or choking.

### People near death may not respond to others.

People may withdraw and spend more time sleeping. They may answer questions slowly or not at all, seem confused, and may not be interested in what's going on around them. Most people are still able to hear after they are no longer able to speak. It may give some comfort if family members continue to touch and talk to the person, even if they do not respond.

### A number of physical changes are common when a person is near death.

Certain physical changes may occur in a person at the end of life:

- They may feel tired or weak.
- They may pass less urine, and it may be dark in color.
- Their hands and feet may become blotchy, cold, or blue. Caregivers can use blankets to keep the person warm. Electric blankets or heating pads should not be used.
- Their heart rate may go up or down and become irregular.
- Blood pressure usually goes down.
- Breathing may become irregular, with very shallow breathing, short periods of not breathing, or deep, rapid breathing.

However, these signs and changes don't always occur in everyone. For this reason, it may be hard to know when a person is near death.

### Cultural or religious beliefs and customs may be important at the time of death.

After a person dies, family members and caregivers may wish to stay with them awhile. There may be certain customs or rituals that are important to the person and family at this time. These might include rituals for coping with death, handling the person's body, making final arrangements for the body, and honoring the death. It’s important to let the health care team know what customs or rituals are important to the person and their family after the person’s death.

Health care providers, hospice staff, social workers, or spiritual leaders can explain the steps that need to be taken once death has occurred, including contacting a funeral home.

For more information, see Spirituality in Cancer Care.

## Symptoms During the Final Months, Weeks, and Days of Life

Key Points for This Section
- Delirium
  - Delirium can have many causes at the end of life.
  - Delirium may be controlled by finding and treating the cause.
  - Hallucinations that are not related to delirium often occur at the end of life.
- Fatigue
- Shortness of Breath
  - Feeling short of breath is common and may get worse during the final days or weeks of life.
  - The use of opioids and other methods can help the person breathe more easily.
- Pain
  - Pain medicines can be given in several ways.
  - Pain during the final hours of life can usually be controlled.
- Cough
- Constipation
- Trouble Swallowing
- Death Rattle
  - Rattle occurs when saliva or other fluids collect in the throat and upper airways.
  - Non-drug treatments for rattle include changing the person's position and giving less fluid.
  - Death rattle is a sign that death may soon occur.
- Myoclonic Jerking
- Fever
- Hemorrhage
  - Sudden hemorrhage (heavy bleeding) may occur in people who have certain cancers or disorders.
  - Making the person comfortable is the main goal of care during hemorrhage at the end of life.

Common symptoms at the end of life include the following:

- delirium
- feeling very tired
- shortness of breath
- pain
- coughing
- constipation
- trouble swallowing
- rattle sound with breathing
- myoclonic jerks
- fever
- hemorrhage

### Delirium

#### Delirium can have many causes at the end of life.

Delirium is common during the final days of life. Most people have a lower level of consciousness. They may be withdrawn, be less alert, and have less energy. Some people may be agitated or restless, and have hallucinations (see or hear things not really there). People near death should be protected from having accidents or hurting themselves when they are confused or agitated.

Delirium can be caused by the direct effects of cancer, such as a growing tumor in the brain. Other causes include the following:

- A higher- or lower-than-normal amount of certain chemicals in the blood that keep the heart, kidneys, nerves, and muscles working the way they should.
- Side effects of drugs or drug interactions (changes in the way a drug acts in the body when taken with certain other drugs, herbal medicine, or foods).
- Stopping the use of certain drugs or alcohol.
- Dehydration (the loss of needed water from the body).

#### Delirium may be controlled by finding and treating the cause.

Depending on the cause of the delirium, doctors may do the following:

- Give drugs to fix the level of certain chemicals in the blood.
- Stop or lower the dose of the drugs that are causing delirium, or are no longer useful at the end of life, such as drugs to lower cholesterol.
- Treat dehydration by putting fluids into the bloodstream.

For some people in the last hours of life, the decision may be to treat only the symptoms of delirium and make the person as comfortable as possible. There are drugs that work very well to relieve these symptoms.

#### Hallucinations that are not related to delirium often occur at the end of life.

It is common for people near death to have hallucinations that include loved ones who have already died. It is normal for family members to feel distress when these hallucinations occur. Speaking with clergy, the hospital chaplain, or other religious advisors may help.

### Fatigue

#### Fatigue is one of the most common symptoms in the last days of life.

Fatigue (feeling very tired) is one of the most common symptoms in the last days of life. A person's fatigue may become worse every day during this time. Drowsiness, weakness, and sleep problems may occur. Drugs that increase brain activity, alertness, and energy may be helpful. For more information, see Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue).

### Shortness of Breath

#### Feeling short of breath is common and may get worse during the final days or weeks of life.

Shortness of breath or not being able to catch your breath is often caused by advanced cancer. Other causes include the following:

- build-up of fluid in the abdomen
- loss of muscle strength
- hypoxemia (a condition in which there is not enough oxygen in the blood)
- chronic obstructive pulmonary disease (COPD)
- pneumonia
- infection

#### The use of opioids and other methods can help the person breathe more easily.

Opioids may relieve shortness of breath in people near death. Other drugs, such as bronchodilators or steroids may be considered if they are in line with the person’s goals of care.

Other ways to help people who feel short of breath include the following:

- Give extra oxygen if shortness of breath is caused by hypoxemia.
- Aim a cool fan toward their face.
- Have them sit up.
- Give antibiotics if the shortness of breath is caused by an infection.

### Pain

#### Pain medicines can be given in several ways.

In the last days of life, a person may not be able to swallow pain medicine. When medicines cannot be taken by mouth, the pain medicine may be given by injection or infusion. These methods can be used at home with a doctor's order.

#### Pain during the final hours of life can usually be controlled.

Opioid analgesics work very well to relieve pain and are commonly used at the end of life. Some patients and family members worry that the use of opioids may cause death to occur sooner, but studies have shown no link between opioid use and early death. For more information about opioids, see Cancer Pain.

### Cough

#### Cough at the end of life can be treated in several ways.

Cough at the end of life may add to a person's discomfort. Repeated coughing can cause pain and loss of sleep, increase tiredness, and make shortness of breath worse. At the end of life, the decision may be to treat the symptoms of the cough rather than to find and treat the cause. The following types of drugs may be used to make the person as comfortable as possible:

- Over-the-counter cough medicines with expectorants to increase bronchial fluids and loosen mucus.
- Medicines to decrease mucus production that can cause coughing in people who have trouble swallowing.
- Opioids to stop the coughing.

For more information, see Cardiopulmonary Syndromes.

### Constipation

#### Constipation may occur in the last days of life.

People with cancer may have constipation in the last days of life. People who have trouble swallowing may not be able to take laxatives by mouth to treat the constipation. If needed, laxatives may be given rectally to make them comfortable.

### Trouble Swallowing

#### People may have trouble swallowing food and fluids at the end of life.

People with cancer may have trouble swallowing in the last days of life. Both fluids and food may be hard to swallow, causing a loss of appetite, weight loss and muscle wasting, and weakness. Small amounts of food that the person enjoys may be given if they want to eat. Supplemental nutrition does not benefit patients in the last days of life and may increase the risk of aspiration and infections.

When the person cannot swallow, medicine may be given by placing it in the rectum, giving it by injection or infusion, or by placing a patch on the skin.

### Death Rattle

#### Rattle occurs when saliva or other fluids collect in the throat and upper airways.

Rattle occurs when saliva or other fluids build up in the throat and airways in a person who is too weak to clear the throat. There are two types of rattle. Death rattle is caused by saliva pooling at the back of the throat. The other kind of rattle is caused by fluid in the airways from an infection, a tumor, aspiration, or extra fluid in body tissues.

Drugs may be given to decrease the amount of saliva in the mouth or to dry the upper airway.

#### Non-drug treatments for rattle include changing the person's position and giving less fluid.

Raising the head of the bed, propping the person up with pillows, or turning them to either side often relieves rattle. If the rattle is caused by fluid at the back of the throat, the fluid may be gently removed from the mouth using a suction tube.

#### Death rattle is a sign that death may soon occur.

Death rattle is a sign that death may occur in hours or days. Rattle can be very upsetting for those at the bedside. It does not seem to be painful for the person and is not the same as shortness of breath.

### Myoclonic Jerking

#### Myoclonic jerks may be caused by taking very high doses of opioids for a long time.

Myoclonic jerks are sudden muscle twitches or jerks that cannot be controlled by the person having them. A hiccup is one type of myoclonic jerk. Brief, shock-like jerks can occur in one or more different muscle groups anywhere in the body. Taking very high doses of an opioid for a long time may cause this side effect, but it can have other causes as well.

When opioids are the cause of myoclonic jerking, changing to another opioid may help. People respond to opioids in different ways, and certain opioids may be more likely than others to cause myoclonic jerking in some people.

When a person is very near death, medicine to stop the myoclonic jerking may be given instead of changing the opioid. When myoclonic jerking is severe, drugs may be used to calm the person down, relieve anxiety, and help them sleep.

### Fever

#### Fever may be caused by infection, medicines, or the cancer itself.

Treatment of fever in the last days of life depends on whether it causes the person distress or discomfort. Fever may be caused by infection, medicines, or the cancer itself. Although infections may be treated with antibiotics, people near the end of life may choose not to treat the cause of the fever.

### Hemorrhage

#### Sudden hemorrhage (heavy bleeding) may occur in people who have certain cancers or disorders.

Hemorrhage (heavy bleeding in a short time) is rare but may occur in the last hours or minutes of life. Blood vessels may be damaged by certain cancers or cancer treatments. Radiation therapy, for example, can weaken blood vessels in the area that was treated. Tumors can also damage blood vessels. People with the following conditions have an increased risk of hemorrhage:

- advanced cancer, especially head and neck cancers
- ulcers
- mucositis caused by chemotherapy
- blood clotting disorders

The person and family should talk with the doctor about any concerns they have about the chance of hemorrhage.

#### Making the person comfortable is the main goal of care during hemorrhage at the end of life.

It is hard to know when hemorrhage might occur. When sudden bleeding occurs at the end of life, people usually become unconscious and die soon afterwards. Resuscitation (restarting the heart) usually will not work.

The main goal of care is to make the person comfortable and to support family members. If hemorrhage occurs, it can be very upsetting, and it may be helpful for the family to ask questions about it and talk about their feelings with one another and their care team.

## Care Decisions in the Final Weeks, Days, and Hours of Life

Key Points for This Section
- Decisions about Chemotherapy
- Decisions about Targeted Therapy
- Decisions about Immunotherapy
- Decisions about Hospice
- Decisions about Place of Death

### Decisions about Chemotherapy

Decisions about whether to continue or stop chemotherapy are made by the patient and doctor together. About one-third of people with advanced cancer continue to receive chemotherapy or other treatment near the end of life.

Treatment with chemotherapy at this time can result in the following:

- serious side effects
- spending more days in the hospital
- spending the last days of life in an intensive care unit

However, some people with cancer choose to continue chemotherapy because they feel it helps them to live in the present and focus on active treatment. Other people choose palliative or comfort care to treat pain and other symptoms. These decisions are based on the person's goals of care and the likely risks and benefits of treatment.

### Decisions about Targeted Therapy

Decisions about whether to continue or stop targeted therapy are made by the patient and doctor together. Targeted therapies may help people with tumors that have spread to other areas in the body.

Treatment with targeted therapy at the end of life can result in the following:

- spending the last days of life in a hospital
- poor awareness of prognosis
- less time to prepare for the end of life

### Decisions about Immunotherapy

Decisions about whether to continue or stop immunotherapy are made by the patient and doctor together. Many people taking immunotherapy are older or are no longer helped by chemotherapy, but these drugs may still have unwanted side effects.

Treatment with immunotherapy at the end of life can result in the following:

- being less likely to use hospice services
- spending the last days of life in the hospital
- having problems related to medical costs (financial toxicity)

### Decisions about Hospice

Hospice care is an important end-of-life option for people with advanced cancer. People may feel that beginning hospice care means they have given up. Some people fear losing the relationship with their oncologist. However, many patients and caregivers feel they receive important benefits from hospice care.

People who receive hospice care seem to have the following:

- better mental outlook
- better relief of symptoms
- better communication
- better end-of-life care
- more days spent at home
- less stressful death (without causing death to happen sooner)

Hospice-related services include:

- visiting nurse
- chaplain
- counselor
- home health aide
- respite care

Doctors, patients, and caregivers should discuss hospice care and when it should begin.

When hospice benefits are covered by Medicare, physicians are required to certify that the person is not expected to live more than 6 months and is not being treated to be cured. Other policies may be different, depending on the hospice and the state.

### Decisions about Place of Death

Many people with advanced cancer wish to die at home. People who die at home with hospice services and support seem to have better symptom control and quality of life. They also feel better prepared for death than people who die in a hospital or intensive care unit. Grieving caregivers have less trouble adjusting to their loss and feel they have honored the person's wishes when their loved one dies at home.

People who get hospice care are more likely to be able to die at home. Hospice care can help control the person's symptoms and give the caregiver the help they need.

However, not all people choose to die at home. It is important for the person, caregivers, and doctors to discuss where the person wants to die and the best way to fulfill the person's decision.

For children with advanced cancer, families and doctors should discuss wishes for the place of death early in the course of the disease. Children who die in the hospital may have more intense treatments and their parents may have more complicated grief than those of children who die at home.

## Decisions about Life-Sustaining Treatments in the Last Days of Life

Key Points for This Section
- In the last days of life, patients and family members will have to make decisions about treatments to keep the person alive.
- Choices about care and treatment at the end of life should be made while the person is able to make them.
- Care that supports a person's spiritual health may improve quality of life.
- Fluids
- Nutrition Support
  - The goals of nutrition support for patients in the last days of life are different from the goals during cancer treatment.
  - Making plans for nutrition support in the last days is helpful.
  - Two types of nutrition support are commonly used.
- Antibiotics
- Transfusions
- Resuscitation

### In the last days of life, patients and family members will have to make decisions about treatments to keep the person alive.

Decisions about whether to use life-sustaining treatments that may extend life in the final weeks or days cause a great deal of confusion and anxiety. Some of these treatments are ventilator use, parenteral nutrition, and dialysis.

People near death may be guided by their oncologist, but they have the right to make their own choices about life-sustaining treatments. The following are some of the questions to discuss:

- What are the person’s goals of care?
- How would the possible benefits of life-sustaining treatments help reach the person's goals of care, and how likely is the desired outcome?
- How would the possible harms of life-sustaining treatments affect the person's goals of care? Is the possible benefit worth the possible harm?
- Besides possible benefits and harms of life-sustaining treatments, what else can affect the decision?
- Are there other resources, such as palliative care, a chaplain, or a medical ethicist, that could help the person or family make decisions about life-sustaining treatments?

### Choices about care and treatment at the end of life should be made while the person is able to make them.

A person may wish to receive all possible treatments, only some treatments, or no treatment at all in the last days of life. These decisions may be written down ahead of time in an advance directive, such as a living will. Advance directive is the general term for different types of legal documents that describe the treatment or care a patient wishes to receive or not receive when he or she is no longer able to speak their wishes.

Without knowing a person's wishes, the health care team will do everything medically possible to keep the person alive, such as cardiopulmonary resuscitation (CPR) and the use of a ventilator (breathing machine).

Studies have shown that people with cancer who have end-of-life discussions with their doctors choose to have fewer procedures, such as resuscitation or the use of a ventilator. They are also less likely to be in intensive care, and the cost of their health care is lower during their final week of life. Reports from their caregivers show that these people live just as long as those who choose to have more procedures, and have a better quality of life in their last days.

### Care that supports a person's spiritual health may improve quality of life.

A spiritual assessment is a method or tool used by doctors to understand the role that religious and spiritual beliefs have in the person's life. This may help the doctor understand how these beliefs affect the way the person copes with cancer and makes decisions about cancer treatment.

Serious illnesses like cancer may cause people or family caregivers to have doubts about their beliefs or religious values and cause spiritual distress. Some studies show that people with cancer may feel anger at God or may have a loss of faith after being diagnosed. Other people may have feelings of spiritual distress when coping with cancer. Spiritual distress may affect end-of-life decisions and increase depression.

Doctors and nurses, together with social workers and psychologists, may be able to offer care that supports a person's spiritual health. They may encourage the person to meet with their spiritual or religious leaders or join a spiritual support group. This may improve a person's quality of life and ability to cope. When people with advanced cancer receive spiritual support from the medical team, they are more likely to choose hospice care and less aggressive treatment at the end of life.

For more information, see Spirituality in Cancer Care.

### Fluids

#### The goals of giving fluids at the end of life should be discussed by patient, family, and doctors.

Fluids may be given when the person can no longer eat or drink normally. Fluids may be given with an intravenous (IV) catheter or through a needle under the skin.

Decisions about giving fluids should be based on the person's goals of care. Giving fluids has not been shown to help patients live longer or improve their quality of life. However, the harms are minor and the family may feel there are benefits if the person is less fatigued and more alert.

The family may also be able to give the person sips of water or ice chips or swab the mouth and lips to keep them moist.

### Nutrition Support

#### The goals of nutrition support for patients in the last days of life are different from the goals during cancer treatment.

Nutrition support can improve health and boost healing during cancer treatment. The goals of nutrition therapy for people during the last days of life are different from the goals for people in active cancer treatment and recovery. In the final days of life, people often lose the desire to eat or drink and may not want food or fluids that are offered to them. Also, procedures used to put in feeding tubes may be hard on them.

#### Making plans for nutrition support in the last days is helpful.

The goal of end-of-life care is to prevent suffering and relieve symptoms. If nutrition support causes the person more discomfort than help, then nutrition support near the end of life may be stopped. The needs and best interests of each person guide the decision to give nutrition support. When decisions and plans about nutrition support are made by the person near death, doctors and family members can be sure they are doing what the person wants.

#### Two types of nutrition support are commonly used.

If the person cannot swallow, two types of nutrition support are commonly used:

- Enteral nutrition uses a tube inserted into the stomach or intestine.
- Parenteral nutrition uses an intravenous (IV) catheter inserted into a vein.

Each type of nutrition support has benefits and risks. For more information, see Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).

### Antibiotics

#### The benefits of using antibiotics in the last days of life are unclear.

The use of antibiotics and other treatments for infection is common in people in the last days of life, but it is hard to tell how well they work. It is also hard to tell if there are any benefits of using antibiotics at the end of life.

Overall, doctors want to make the person comfortable in the last days of life rather than give treatments that may not help them live longer.

### Transfusions

#### The decision to use blood transfusions in advanced cancer depends on goals of care and other factors.

Many people with advanced cancer have anemia. People with advanced blood cancers may have thrombocytopenia (a condition in which there is a lower-than-normal number of platelets in the blood). Deciding whether to use blood transfusions for these conditions is based on the following:

- goals of care
- how long the person is expected to live
- the benefits and risks of the transfusion

The decision can be hard to make because people usually need to receive transfusions in a medical setting rather than at home.

Many people with cancer are used to receiving blood transfusions during active treatment or supportive care and may want to continue transfusions to feel better. However, studies have not shown that transfusions are safe and effective at the end of life.

### Resuscitation

#### People should decide whether or not they want cardiopulmonary resuscitation (CPR).

An important decision for a person near death to make is whether to have cardiopulmonary resuscitation (CPR) (trying to restart the heart and breathing when it stops). It is best if people talk with their family, doctors, and caregivers about their wishes for CPR as early as possible (for example, when being admitted to the hospital or when active cancer treatment is stopped). A do-not-resuscitate (DNR) order is written by a doctor to tell other health professionals not to perform CPR at the moment of death, so that the natural process of dying occurs. If the person wishes, he or she can ask the doctor to write a DNR order. The person can ask that the DNR order be changed or removed at any time.

## Last Days in the Hospital or Intensive Care Unit

Key Points for This Section
- Choices about whether to use intensive care should be discussed.
- Ventilator use may keep a person alive after normal breathing stops.

### Choices about whether to use intensive care should be discussed.

Near the end of life, people with advanced cancer may be admitted to a hospital or intensive care unit (ICU) if they have not made other choices for their care. In the ICU, patients or family members have to make hard decisions about whether to start, continue, or stop aggressive treatments that may make the person live longer but harm their quality of life. Families may be unsure of their feelings or have trouble deciding whether to limit or avoid treatments.

Sometimes, treatments like dialysis or blood transfusions may be tried for a short time. However, at any time, patients or families may talk with doctors about whether they want to continue with ICU care. They may choose instead to change over to comfort care in the final days.

### Ventilator use may keep a person alive after normal breathing stops.

A ventilator is a machine that helps people breathe. Sometimes, using a ventilator will not improve the person's condition but will keep them alive longer. If the goal of care is to help the person live longer, a ventilator may be used, according to the person's wishes. If ventilator support stops helping or is no longer what the person wants, the person, their family, and the health care team may decide to turn the ventilator off.

#### Before a ventilator is turned off, family members will be given information about what to expect.

Family members will be given information about how the person may respond when the ventilator is removed and about pain relief or sedation to keep the person comfortable. Family members will be given time to contact other loved ones who wish to be there. Chaplains or social workers may be called to support to the family.

## Suffering and Palliative Sedation at the End of Life

Key Points for This Section
- The emotions of patients and caregivers are closely connected.
- Palliative sedation lowers the level of consciousness and relieves extreme pain and suffering.

### The emotions of patients and caregivers are closely connected.

Patients and caregivers share the distress of cancer, with the caregiver's distress sometimes being greater than the patient's distress. Since caregiver suffering can affect the person's well-being and the caregiver's adjustment to loss, early and constant support of the caregiver is very important.

### Palliative sedation lowers the level of consciousness and relieves extreme pain and suffering.

Palliative sedation uses drugs called sedatives to relieve extreme suffering by making a person calm and unaware.

The decision whether to sedate a person at the end of life is a hard one. Sedation may be considered for a person's comfort or for a physical condition such as uncontrolled pain. Palliative sedation may be given on and off, or until death. A person's thoughts and feelings about end-of-life sedation may depend greatly on his or her own culture and beliefs. Some people who become anxious facing the end of life may want to be sedated. Some people and their families may wish to have a level of sedation that allows them to communicate with each other. Other people may wish to have no procedures, including sedation, just before death.

Studies have not shown that palliative sedation shortens life when used in the last days.

It is important for the person to tell family members and health care providers of their wishes about sedation at the end of life. When a person makes their wishes about sedation known ahead of time, doctors and family members can be sure they are doing what the person would want. Families may need support from the health care team and mental health counselors while palliative sedation is used.

## Grief and Loss

Grief is a normal reaction to the loss of a loved one. People who feel unable to cope with their loss may be helped by grief counseling or grief therapy with trained professionals. For more information, see Grief, Bereavement, and Coping With Loss.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about patient care during the last days to last hours of life. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Last Days of Life. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/planning/last-days-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389429]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).